# Late Effects of Treatment for Childhood Cancer (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the late effects of treatment for childhood cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Late Effects

Key Points for This Section
- Late effects are health problems that occur months or years after cancer treatment has ended.
- Late effects in childhood cancer survivors affect the body and mind.
- There are three important factors that affect the risk of late effects.
- The chance of having late effects increases over time.
- Regular follow-up care is very important for survivors of childhood cancer.
- Good health habits are also important for survivors of childhood cancer.

### Late effects are health problems that occur months or years after cancer treatment has ended.

Cancer treatments may harm the body's organs, tissues, or bones and cause health problems later in life. They may include physical, mental, and social problems and second cancers. These health problems are called late effects.

Treatments that may cause late effects include:

- surgery
- chemotherapy
- radiation therapy
- stem cell transplant

Doctors are studying the late effects caused by cancer treatment. They are working to improve cancer treatments and stop or lessen late effects. While most late effects are not life-threatening, they may cause serious problems that affect health and quality of life.

### Late effects in childhood cancer survivors affect the body and mind.

Late effects in childhood cancer survivors may affect:

- organs, tissues, and body function
- growth and development
- mood, feelings, and actions
- thinking, learning, and memory
- social and psychological adjustment
- risk of second cancers

### There are three important factors that affect the risk of late effects.

Many childhood cancer survivors will have late effects. The risk of late effects depends on factors related to the tumor, treatment, and patient. These include:

- Cancer-related factors
  - type of cancer
  - the organs and tissues that were affected by the cancer
- Treatment-related factors
  - type of radiation therapy, part of the body treated, and dose
  - chemotherapy type, dose, and schedule
  - type of surgery
  - stem cell transplant
  - how the use of two or more treatments at the same time affects the body
  - whether transplanted stem cells attack the body's healthy cells, a condition known as chronic graft-versus-host disease
- Patient-related factors
  - the childhood cancer survivor's sex
  - health problems the childhood cancer survivor had before being diagnosed with cancer or developed during or after treatment
  - the age and developmental stage when diagnosed and treated for childhood cancer
  - length of time since diagnosis and treatment
  - changes in hormone levels
  - the ability of healthy tissue affected by cancer treatment to repair itself
  - certain changes in the childhood cancer survivor's genes or a family history of cancer or other conditions
  - socioeconomic status
  - health habits

### The chance of having late effects increases over time.

New treatments for childhood cancer have decreased the number of deaths from the primary cancer. Because childhood cancer survivors are living longer, they are having more late effects after cancer treatment. Survivors may not live as long as people who did not have cancer. The most common causes of death in childhood cancer survivors are:

- the primary cancer comes back
- a second (different) primary cancer forms
- heart and lung damage

Studies of the causes of late effects have led to changes in treatment. This has improved the quality of life for cancer survivors and helps prevent illness and death from late effects.

### Regular follow-up care is very important for survivors of childhood cancer.

Regular follow-up by health professionals who are trained to find and treat late effects is important for the long-term health of childhood cancer survivors. Follow-up care will be different for each person who has been treated for cancer. The care plan the cancer survivor receives will depend on their general health and health habits, the type of cancer, the type of treatment, genetic factors, and other medical conditions. Follow-up care includes checking for symptoms of late effects and health education on how to prevent or lessen late effects.

It is important that childhood cancer survivors have an exam at least once a year. The exams should be done by a health professional who knows the survivor's risk for late effects and can recognize the early signs of late effects. Blood and imaging tests may also be done.

Long-term follow-up may improve the health and quality of life for cancer survivors. It also helps doctors study the late effects of cancer treatments so that safer therapies for newly diagnosed children may be developed.

### Good health habits are also important for survivors of childhood cancer.

The quality of life for cancer survivors may be improved by behaviors that promote health and well-being. These include a healthy diet, exercise, and regular medical and dental check-ups. These self-care behaviors are especially important for cancer survivors because of their risk of health problems related to treatment. Healthy behaviors may make late effects less severe and lower the risk of other diseases.

Avoiding behaviors that are damaging to health is also important. Smoking, excess alcohol use, illegal drug use, not following good sun protection measures, or not being physically active may worsen organ damage related to treatment and may increase the risk of second cancers.

## Second Cancers

Key Points for This Section
- Childhood cancer survivors have an increased risk of a second cancer later in life.
- Certain genetic patterns or syndromes may increase the risk of a second cancer.
- People who have been treated for cancer need regular screening tests to check for a second cancer.
- The kind of test used to screen for a second cancer depends in part on the kind of cancer treatment the survivors had in the past.

### Childhood cancer survivors have an increased risk of a second cancer later in life.

A different primary cancer that occurs at least two months after cancer treatment ends is called a second cancer. A second cancer may occur months or years after treatment is completed. The type of second cancer that occurs depends in part on the original type of cancer and the cancer treatment. Benign tumors (not cancer) may also occur.

Second cancers that may occur after cancer treatment include:

- myelodysplastic syndrome and acute myeloid leukemia
- solid tumors

Myelodysplastic syndrome and acute myeloid leukemia may appear less than 10 years after a primary cancer diagnosis of Hodgkin lymphoma, acute lymphoblastic leukemia, sarcoma, central nervous system (CNS) tumor, non-Hodgkin lymphoma, neuroblastoma, or Wilms tumor and treatment with chemotherapy that included:

- an alkylating agent, such as cyclophosphamide, ifosfamide, mechlorethamine, melphalan, busulfan, carmustine, lomustine, chlorambucil, or dacarbazine
- a topoisomerase II inhibitor agent, such as etoposide

Children treated with radiation to the bone marrow without chemotherapy may also have an increased risk of second acute myeloid leukemia.

Solid tumors that may appear more than 10 years after a primary cancer diagnosis and treatment include:

- Breast cancer. Survivors of childhood, adolescent, and young adult cancers who received high-dose radiation therapy to the chest have an increased risk of developing breast cancer. Certain chemotherapy drugs, including alkylating agents and anthracyclines, also increase a person's risk of breast cancer. Risk is highest for female survivors of Hodgkin lymphoma, sarcoma, and leukemia.
- Thyroid cancer. Thyroid cancer may occur after radiation therapy to the neck for Hodgkin lymphoma, acute lymphoblastic leukemia, or brain tumors; after radioactive iodine therapy for neuroblastoma; after total-body irradiation as part of a stem cell transplant; or after chemotherapy alone.
- Brain tumors. Brain tumors may occur after radiation therapy to the head and/or intrathecal chemotherapy using methotrexate for a primary brain tumor or for cancer that has spread to the brain or spinal cord, such as acute lymphocytic leukemia or non-Hodgkin lymphoma. When intrathecal chemotherapy using methotrexate and radiation treatment are given together, the risk of a brain tumor is even higher.
- Bone and soft tissue tumors. There is an increased risk of bone and soft tissue tumors after radiation treatment for hereditary retinoblastoma, Ewing sarcoma, and other cancers of the bone, with risks increasing at higher doses. Chemotherapy with anthracyclines or alkylating agents also increases the risk of bone and soft tissue tumors, with risk increasing at higher doses.
- Lung cancer. There is an increased risk of lung cancer after radiation treatment to the chest for Hodgkin lymphoma or bone cancer, especially in patients who smoke.
- Stomach, liver, or colorectal cancer. Stomach, liver, or colorectal cancer may occur after receiving radiation therapy to the abdomen or pelvis, chemotherapy, or both. Survivors of Wilms tumor and Hodgkin lymphoma have the highest risk of these second cancers. The risk increases with higher doses of radiation. There is also an increased risk of colorectal polyps.
- Nonmelanoma skin cancer (basal cell carcinoma or squamous cell carcinoma). There is an increased risk of nonmelanoma skin cancer after radiation treatment, and it usually appears in the area where radiation was given. Being exposed to UV radiation may increase this risk. Patients who develop nonmelanoma skin cancer after radiation treatment have an increased chance of developing other types of cancers in the future. The risk of basal cell carcinoma is also increased after treatment with chemotherapy drugs, such as vincristine and vinblastine (called vinca alkaloids). Survivors of hereditary retinoblastoma may have an increased risk of developing nonmelanoma skin cancer.
- Malignant melanoma. Malignant melanoma may occur after radiation or combination chemotherapy with alkylating agents and antimitotic drugs (such as vincristine and vinblastine). Survivors of Hodgkin lymphoma, hereditary retinoblastoma, soft tissue sarcoma, and gonadal tumors are more likely to be at a higher risk of having malignant melanoma. Malignant melanoma as a second cancer is less common than nonmelanoma skin cancer. Survivors of hereditary retinoblastoma may have an increased risk of developing melanoma.
- Oral, laryngeal, and salivary gland cancer. Oral cancer may occur after stem cell transplant with a history of chronic graft-versus-host disease, radiation therapy, or chemotherapy. Survivors of leukemia, osteosarcoma, Hodgkin lymphoma, and soft tissue sarcoma have the highest risk of oral cancers. Childhood, adolescent, and young adult cancer survivors may also be at increased risk of developing oral cancers related to infection with human papillomavirus.
- Kidney cancer. There is an increased risk of kidney cancer after treatment for neuroblastoma, radiation treatment to the middle of the back, or chemotherapy such as cisplatin or carboplatin.
- Bladder cancer and genital cancer. Bladder cancer may occur after chemotherapy with cyclophosphamide. Survivors of heritable retinoblastoma have an increased risk of developing bladder cancer. Female survivors have an increased risk of cancer in the uterus or vulva.

### Certain genetic patterns or syndromes may increase the risk of a second cancer.

Some childhood cancer survivors may have an increased risk of developing a second cancer because they have a family history of cancer, an inherited cancer syndrome such as Li-Fraumeni syndrome, or a genetic mutation such as neurofibromatosis type 1. Problems with the way DNA is repaired in cells and the way anticancer drugs are used by the body may also affect the risk of second cancers.

### People who have been treated for cancer need regular screening tests to check for a second cancer.

It is important for people who have been treated for cancer to be checked for a second cancer before symptoms appear. This is called screening and may help find a second cancer when it is smaller and has not spread. When abnormal tissue or cancer is found early, it may be easier to treat. By the time symptoms appear, cancer may have begun to spread.

It is important to remember that the doctor does not necessarily think a childhood cancer survivor has cancer if he or she suggests a screening test. Screening tests are given when the cancer survivor has no cancer symptoms. If a screening test result is abnormal, more tests may be done to find out if there is a second cancer. These are called diagnostic tests.

### The kind of test used to screen for a second cancer depends in part on the kind of cancer treatment the survivors had in the past.

Childhood cancer survivors should have a physical exam and medical history done once a year. A physical exam of the body is done to see how healthy the person is and to check for signs of disease, such as lumps, changes in the skin, or anything else that seems unusual. A medical history is taken to learn about the cancer survivor's health habits and past illnesses and treatments.

Childhood cancer survivors who received radiation therapy may have the following tests and procedures to check for skin, breast, or colorectal cancer:

- Skin exam is when a doctor or nurse checks the skin for bumps or spots that look abnormal in color, size, shape, or texture, especially in the area where radiation was given. It is suggested that a skin exam be done once a year to check for signs of skin cancer. The doctor will also provide information about sun protection behaviors to reduce the risk of skin cancer.
- Breast self-exam is an exam of the breast by the patient. The patient carefully feels the breasts and under the arms for lumps or anything else that seems unusual. It is suggested that women treated with a higher dose of radiation therapy to the chest do a monthly breast self-exam beginning at puberty. Talk to the doctor about when breast self-exams should begin.
- Clinical breast exam (CBE) is an exam of the breast by a doctor or other health professional. The doctor will carefully feel the breasts and under the arms for lumps or anything else that seems unusual. It is suggested that women treated with a higher dose of radiation therapy to the chest have a clinical breast exam every year beginning at puberty until age 25. After age 25 or 8 years after radiation treatments end (whichever is first), clinical breast exams are done every 6 months. Talk to the doctor about when clinical breast exams should begin.
- Mammogram is an x-ray of the breast. A mammogram may be done in women who had a higher dose of radiation to the chest and who do not have dense breasts. It is suggested that these women have a mammogram once a year starting 8 years after treatment or at age 25, whichever is later. Talk to the doctor about when mammograms to check for breast cancer should begin.
- Breast MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of the breast. This procedure is also called nuclear magnetic resonance imaging (NMRI). An MRI may be done in women who had a higher dose of radiation to the chest and who have dense breasts. It is suggested that these women have an MRI once a year starting 8 years after treatment or at age 25, whichever is later. Talk to the doctor about whether an MRI of the breast to check for breast cancer is needed.
- Colonoscopy is a procedure to look inside the rectum and colon for polyps, abnormal areas, or cancer. A colonoscope is inserted through the rectum into the colon. A colonoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove polyps or tissue samples, which are checked under a microscope for signs of cancer. It is suggested that childhood cancer survivors who had a higher dose of radiation to the abdomen, pelvis, or spine have a colonoscopy every 5 years. This begins at age 30 or 5 years after treatment ended, whichever is later. Talk to your doctor about when colonoscopies to check for colorectal cancer should begin.
- Multitarget stool DNA test is a test to collect stool to check for cancer cells. This test may be done every 3 years beginning at age 30 or 5 years after treatment ended.

## Cardiovascular System

Key Points for This Section
- Heart and blood vessel late effects are more likely to occur after treatment for certain childhood cancers.
- Radiation to the chest and certain types of chemotherapy increase the risk of heart and blood vessel late effects.
- Late effects that affect the heart and blood vessels may cause certain health problems.
- Possible symptoms of heart and blood vessel late effects include trouble breathing and chest pain.
- Certain tests and procedures are used to diagnose health problems in the heart and blood vessels.
- Health habits that promote a healthy heart and blood vessels are important for survivors of childhood cancer.

### Heart and blood vessel late effects are more likely to occur after treatment for certain childhood cancers.

Cardiovascular disease occurs at a younger age in childhood cancer survivors. Treatment for these and other childhood cancers may cause heart and blood vessel late effects:

- acute lymphoblastic leukemia (ALL)
- acute myeloid leukemia (AML)
- brain and spinal cord tumors
- head and neck cancers
- Hodgkin lymphoma
- non-Hodgkin lymphoma
- osteosarcoma
- Wilms tumor
- cancers treated with a stem cell transplant

### Radiation to the chest and certain types of chemotherapy increase the risk of heart and blood vessel late effects.

The risk of health problems involving the heart and blood vessels increases after treatment with:

- Radiation to the chest, spine, brain, neck, kidneys, or total-body irradiation (TBI) as part of a stem cell transplant. The risk of problems depends on the area of the body that was exposed to radiation, the amount of radiation given, and whether the radiation was given in small or large doses.
- Certain types of chemotherapy. Chemotherapy with anthracyclines such as doxorubicin, daunorubicin, idarubicin, and epirubicin, and with anthraquinones such as mitoxantrone increase the risk of heart and blood vessel problems. The risk of problems depends on the total dose of chemotherapy given and the type of drug used. It also depends on whether treatment with anthracyclines was given to a child younger than 13 years and whether a drug called dexrazoxane was given during treatment with anthracyclines. Dexrazoxane may lessen heart and blood vessel damage up to 5 years after treatment. Ifosfamide, cyclophosphamide, methotrexate, asparaginase, and chemotherapy with a platinum, such as carboplatin and cisplatin, may also cause heart and blood vessel late effects.
- Stem cell transplant.
- Nephrectomy (surgery to remove all or part of a kidney).

Childhood cancer survivors who were treated with both radiation therapy to the heart or blood vessels and certain types of chemotherapy are at greatest risk.

Other factors that may also increase the risk of heart and blood vessel late effects include:

- Longer time since treatment.
- Having high blood pressure or other risk factors for heart disease, such as a family history of heart disease, having excess body weight, smoking, high cholesterol, or diabetes. When these risk factors are combined, the risk of late effects is even higher.
- Having lower than normal amounts of thyroid, growth, or sex hormones.

New treatments that decrease the amount of radiation given, use lower doses of chemotherapy or less harmful chemotherapy drugs, and incorporate dexrazoxane may be leading to a lower risk of heart and blood vessel late effects in childhood cancer survivors.

### Late effects that affect the heart and blood vessels may cause certain health problems.

Childhood cancer survivors who received radiation or certain types of chemotherapy have an increased risk of late effects to the heart and blood vessels and related health problems. These include:

- abnormal heartbeat
- weakened heart muscle
- inflamed heart or sac around the heart
- damage to the heart valves
- hardening of the heart arteries (coronary artery disease)
- congestive heart failure
- high blood pressure
- chest pain or heart attack
- blood clots or one or more strokes
- carotid artery disease

### Possible symptoms of heart and blood vessel late effects include trouble breathing and chest pain.

These and other symptoms may be caused by heart and blood vessel late effects or by other problems:

- trouble breathing, especially when lying down
- heartbeat that is too slow, too fast, or different from the heart's normal rhythm
- chest pain or pain in the arm or leg
- swelling of the feet, ankles, legs, or abdomen
- when exposed to cold or having strong emotions, the fingers, toes, ears, or nose become white and then turn blue, and sometimes the fingers will also have pain or tingling
- sudden numbness or weakness of the face, arm, or leg (especially on one side of the body)
- sudden confusion or trouble speaking or understanding speech
- sudden trouble seeing with one or both eyes
- sudden trouble walking or feeling dizzy
- sudden loss of balance or coordination
- sudden severe headache for no known reason
- pain, warmth, or redness in one area of the arm or leg, especially the back of the lower leg

The only way to know if these symptoms are caused by heart and blood vessel late effects is to see a doctor.

### Certain tests and procedures are used to diagnose health problems in the heart and blood vessels.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Electrocardiogram (EKG) is a recording of the heart's electrical activity to check its rate and rhythm. A number of small pads (electrodes) are placed on the patient's chest, arms, and legs, and are connected by wires to the EKG machine. Heart activity is then recorded as a line graph on paper. Electrical activity that is faster or slower than normal may be a sign of heart disease or damage.
- Echocardiogram is a procedure in which high-energy sound waves (ultrasound) are bounced off the heart and nearby tissues or organs and make echoes. A moving picture is made of the heart and heart valves as blood is pumped through the heart.
- Ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs such as the heart and make echoes. The echoes form a picture of body tissues called a sonogram.
- Magnetic resonance imaging (MRI) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI). This procedure is done to check for blood clots.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is done to check for blood clots. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
- Magnetic resonance angiography (MRA) uses radio waves and a powerful magnet linked to a computer to create detailed pictures of the blood vessels and blood flow inside the body. A dye may be injected into a vein to make the blood vessels and blood flow easier to see. This may be used to check for blood clots or other blood vessel problems.
- Lipid profile studies use a blood sample to measure the amounts of triglycerides, cholesterol, and low- and high-density lipoprotein cholesterol in the blood.

Talk to the doctor about whether tests and procedures are needed to check for signs of heart and blood vessel late effects. If tests are needed, find out how often they should be done.

### Health habits that promote a healthy heart and blood vessels are important for survivors of childhood cancer.

Childhood cancer survivors may lower their risk of heart and blood vessel late effects by having a healthy lifestyle, which includes:

- a healthy weight
- a heart-healthy diet, high in vegetables, fruits, whole grains, fish, and poultry, and low in red or processed meats
- regular exercise
- not smoking

## Central Nervous System

Key Points for This Section
- Brain and spinal cord late effects are more likely to occur after treatment of brain tumors and acute lymphoblastic leukemia.
- Radiation to the brain increases the risk of brain and spinal cord late effects.
- Late effects that affect the brain and spinal cord may cause certain health problems.
- Possible symptoms of brain and spinal cord late effects include headaches, loss of coordination, and seizures.
- Certain tests and procedures are used to diagnose health problems in the brain and spinal cord.
- Survivors of childhood cancer have an increased risk of mental health disorders.
- Some childhood cancer survivors have post-traumatic stress disorder.
- Adolescents who are diagnosed with cancer may have social problems later in life.

### Brain and spinal cord late effects are more likely to occur after treatment of brain tumors and acute lymphoblastic leukemia.

Treatment for these and other childhood cancers may cause brain and spinal cord late effects:

- acute lymphoblastic leukemia (ALL)
- acute myeloid leukemia (AML)
- brain and spinal cord tumors
- head and neck cancers, including retinoblastoma
- Hodgkin lymphoma
- non-Hodgkin lymphoma
- osteosarcoma
- soft tissue sarcoma
- neuroblastoma
- Wilms tumor
- cancers treated with a stem cell transplant

### Radiation to the brain increases the risk of brain and spinal cord late effects.

The risk of health problems that affect the brain or spinal cord increases after treatment with:

- radiation (especially high doses) to the brain or spinal cord or total-body irradiation given as part of a stem cell transplant
- intrathecal or intraventricular chemotherapy
- chemotherapy with high-dose methotrexate or cytarabine that can cross the blood-brain barrier (protective lining around the brain) or high-dose chemotherapy given as part of a stem cell transplant
- surgery to remove a tumor on the brain or spinal cord

When radiation to the brain and intrathecal chemotherapy are given at the same time, the risk of late effects is higher.

The following may also increase the risk of brain and spinal cord late effects in childhood brain tumor survivors:

- where the tumor formed in the brain and spinal cord
- being 5 years old or younger at the time of treatment
- being female
- having hydrocephalus and a shunt placed to remove the extra fluid from the ventricles
- having hearing loss
- having cerebellar mutism following surgery to remove the brain tumor
- having a personal history of stroke
- seizures
- socioeconomic status

### Late effects that affect the brain and spinal cord may cause certain health problems.

Childhood cancer survivors who received radiation, certain types of chemotherapy, or surgery to the brain or spinal cord have an increased risk of late effects to the brain and spinal cord and related health problems. A child may develop these problems soon after treatment or years later in adulthood. Brain and spinal cord late effects include:

- headaches that may go away after vomiting
- loss of balance, lack of coordination, or trouble walking
- dizziness
- seizures
- loss of the myelin sheath that covers nerve fibers in the brain
- movement disorders that affect the legs and eyes or the ability to speak and swallow
- nerve damage in the hands or feet
- stroke, with an increased risk for a second stroke for survivors who received radiation to the brain, have a history of high blood pressure, or were older than 40 years when they had their first stroke
- a small amount of bleeding in the brain (brain microbleeds)
- daytime sleepiness
- hydrocephalus
- loss of bladder and/or bowel control
- clusters of abnormal blood vessels (cavernomas)
- back pain

Survivors may also have late effects that affect thinking, learning, memory, emotions, and behavior.

New ways of using more targeted and lower doses of radiation to the brain may lessen the risk of brain and spinal cord late effects.

### Possible symptoms of brain and spinal cord late effects include headaches, loss of coordination, and seizures.

These symptoms may be caused by brain and spinal cord late effects or by other problems:

- trouble speaking or swallowing
- trouble with having the eyes work together
- numbness, tingling, or weakness in the hands or feet
- being unable to bend the ankle to lift the foot up
- sudden numbness or weakness of the face, arm, or leg (especially on one side of the body)
- unusual sleepiness or change in activity level
- unusual changes in personality or behavior
- a change in bowel habits or trouble urinating
- increase in head size (in infants)
- sudden confusion or trouble speaking or understanding speech
- sudden trouble seeing with one or both eyes
- sudden severe headache for no known reason

Other symptoms include:

- problems with memory
- problems with paying attention
- trouble with solving problems
- trouble with organizing thoughts and tasks
- slower ability to learn and use new information
- trouble learning to read, write, or do math
- trouble coordinating movement between the eyes, hands, and other muscles
- delays in normal development
- social withdrawal or trouble getting along with others

The only way to know if these symptoms are caused by brain and spinal cord late effects is to see a doctor.

### Certain tests and procedures are used to diagnose health problems in the brain and spinal cord.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Neurological exam is a series of questions and tests to check the brain, spinal cord, and nerve function. The exam checks a person's mental status, coordination, and ability to walk normally, and how well the muscles, senses, and reflexes work. This may also be called a neuro exam or a neurologic exam. In some cases, a more complete exam may be done by a neurologist or neurosurgeon.
- Neuropsychological assessment is a series of tests to examine the patient's mental processes and behavior. Areas that are checked usually include:
  - knowing who and where you are and what day it is
  - ability to learn and remember new information
  - intelligence
  - ability to solve problems
  - use of spoken and written language
  - eye-hand coordination
  - ability to organize information and tasks

Talk to the doctor about whether tests and procedures are needed to check for signs of brain and spinal cord late effects. If tests are needed, find out how often they should be done.

### Survivors of childhood cancer have an increased risk of mental health disorders.

Survivors of childhood cancer are more likely to be diagnosed with mental health disorders than their peers who have not had cancer. These disorders include:

- depression
- anxiety
- autism spectrum disorder
- bipolar disorder
- obsessive-compulsive disorder
- post-traumatic stress disorder

Having a mental health disorder may cause problems with personal relationships, education, employment, and health, and cause thoughts of suicide. As a result, survivors may be less likely to live on their own as adults.

Follow-up care for childhood cancer survivors should include screening and treatment for possible psychological distress or mental health disorders.

For more information about psychological distress and coping skills for people with cancer, see:

- Adjustment to Cancer: Anxiety and Distress
- Depression

### Some childhood cancer survivors have post-traumatic stress disorder.

Being diagnosed and treated for a life-threatening disease may be traumatic. This trauma may cause post-traumatic stress disorder (PTSD). PTSD is defined as having certain behaviors following a stressful event that involved death or the threat of death, serious injury, or a threat to oneself or others.

PTSD can affect cancer survivors in the following ways:

- constantly reliving or thinking about the time they were diagnosed and treated for cancer
- having nightmares or flashbacks
- avoiding places, events, and people that remind them of the cancer experience

In general, childhood cancer survivors show low levels of PTSD, depending in part on their coping style and the coping style of their parents. Survivors who received radiation therapy to the head when younger than 4 years or survivors who received intensive treatment may be at higher risk of PTSD. Family problems, little or no social support from family or friends, and stress not related to the cancer may increase the chances of having PTSD.

Because avoiding places and people connected to the cancer may be part of PTSD, survivors with PTSD may not get the medical treatment they need.

### Adolescents who are diagnosed with cancer may have social problems later in life.

Adolescents who are diagnosed with cancer may reach fewer social milestones or reach them later in life than adolescents not diagnosed with cancer. Social milestones include having a first boyfriend or girlfriend, getting married, and having a child. They may also have trouble getting along with other people or feel like they are not liked by others their age.

Cancer survivors in this age group have reported being less satisfied with their health and their lives in general compared with others of the same age who did not have cancer. Adolescents and young adults who survived cancer need special programs that give psychological, educational, and job support.

## Digestive System

Key Points for This Section
- Teeth and jaws
  - Problems with the teeth and jaws are more likely to occur after treatment for certain childhood cancers.
  - Radiation to the head and neck and certain types of chemotherapy increase the risk of late effects to the teeth and jaws.
  - Late effects that affect the teeth and jaws may cause certain health problems.
  - Possible symptoms of late effects of the teeth and jaws include tooth decay (cavities) and jaw pain.
  - Certain tests and procedures are used to diagnose health problems in the mouth and jaws.
  - Regular dental care is very important for survivors of childhood cancer.
- Digestive tract
  - Digestive tract late effects are more likely to occur after treatment for certain childhood cancers.
  - Radiation to the bladder, prostate, or testicles and certain types of chemotherapy increase the risk of digestive tract late effects.
  - Late effects that affect the digestive tract may cause certain health problems.
  - Possible symptoms of digestive tract late effects include abdominal pain and diarrhea.
  - Certain tests and procedures are used to diagnose health problems in the digestive tract.
- Liver and bile ducts
  - Liver and bile duct late effects are more likely to occur after treatment for certain childhood cancers.
  - Certain types of chemotherapy and radiation to the liver or bile ducts increase the risk of late effects.
  - Late effects that affect the liver and bile ducts may cause certain health problems.
  - Possible symptoms of liver and bile duct late effects include abdominal pain and jaundice.
  - Certain tests and procedures are used to diagnose health problems in the liver and bile duct.
  - Health habits that promote a healthy liver are important for survivors of childhood cancer.
- Pancreas
  - Radiation therapy increases the risk of pancreatic late effects.
  - Late effects that affect the pancreas may cause certain health problems.
  - Possible symptoms of pancreatic late effects include frequent urination and being thirsty.
  - Certain tests and procedures are used to diagnose health problems in the pancreas.

Treatment with chemotherapy, radiation therapy, or surgery may cause problems throughout the digestive system, which starts at the mouth and ends at the rectum.

### Teeth and jaws

#### Problems with the teeth and jaws are more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause late effects of the teeth and jaws:

- head and neck cancers
- Hodgkin lymphoma
- neuroblastoma
- leukemia that spreads to the brain and spinal cord
- nasopharyngeal cancer
- brain tumors
- cancers treated with total-body irradiation (TBI) as part of a stem cell transplant

#### Radiation to the head and neck and certain types of chemotherapy increase the risk of late effects to the teeth and jaws.

The risk of health problems that affect the teeth and jaws increases after treatment with:

- radiation therapy to the head and neck
- TBI as part of a stem cell transplant
- chemotherapy, especially with higher doses of alkylating agents such as cyclophosphamide
- surgery in the head and neck area

Risk is also increased in survivors who were younger than 5 years at the time of treatment because their permanent teeth had not fully formed.

#### Late effects that affect the teeth and jaws may cause certain health problems.

Teeth and jaws late effects and related health problems include:

- teeth that are not normal
- tooth decay (including cavities) and gum disease
- salivary glands that do not make enough saliva
- death of the bone cells in the jaw
- changes in the way the face, jaw, or skull form
- a second cancer in the mouth

#### Possible symptoms of late effects of the teeth and jaws include tooth decay (cavities) and jaw pain.

These and other symptoms may be caused by late effects of the teeth and jaws or by other problems:

- teeth are small or do not have a normal shape
- missing permanent teeth
- permanent teeth come in at a later than normal age
- teeth have less enamel than normal
- more tooth decay (cavities) and gum disease than normal
- dry mouth
- trouble chewing, swallowing, and speaking
- jaw pain
- jaws do not open and close the way they should

The only way to know if these symptoms are caused by late effects of the teeth and jaws is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the mouth and jaws.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Dental exam is an exam of the teeth, mouth, and jaws to check general signs of dental health, including checking for signs of disease, such as cavities or anything that seems unusual. This may also be called a dental check-up.
- Panorex x-ray is an x-ray of all of the teeth and their roots. An x-ray is a type of radiation that can go through the body and make pictures.
- X-ray of the jaws is an x-ray of the jaws. An x-ray is a type of radiation that can go through the body and make pictures.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the head and neck. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
- Magnetic resonance imaging (MRI) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the head and neck. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for signs of cancer.

Talk to the doctor about whether tests and procedures are needed to check for signs of teeth and jaw late effects. If tests are needed, find out how often they should be done.

#### Regular dental care is very important for survivors of childhood cancer.

Doctors suggest that survivors of childhood cancer have a dental check-up and a cleaning and fluoride treatment every 6 months. Children who had radiation therapy to the oral cavity may also see an orthodontist or an otolaryngologist. If lesions are present in the mouth, a biopsy may be needed.

### Digestive tract

#### Digestive tract late effects are more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause late effects of the digestive tract (esophagus, stomach, small and large intestines, rectum and anus):

- germ cell tumors
- Hodgkin lymphoma
- non-Hodgkin lymphoma
- neuroblastoma
- rhabdomyosarcoma of the bladder or prostate, or near the testicles
- Wilms tumor

#### Radiation to the bladder, prostate, or testicles and certain types of chemotherapy increase the risk of digestive tract late effects.

The risk of health problems that affect the digestive tract increases after treatment with:

- Radiation therapy to the abdomen or areas near the abdomen, such as the esophagus, bladder, prostate, or testicles, may cause digestive tract problems that begin quickly and last for a short time. In some patients, however, digestive tract problems are delayed and long-lasting. These late effects are caused by radiation therapy that damages the blood vessels. Receiving higher doses of radiation therapy or receiving chemotherapy such as dactinomycin or anthracyclines together with radiation therapy may increase this risk.
- Abdominal surgery or pelvic surgery to remove the bladder.
- Chemotherapy with alkylating agents such as cyclophosphamide, procarbazine, and ifosfamide, or with anthracyclines such as doxorubicin, daunorubicin, idarubicin, and epirubicin.
- Stem cell transplant.

The following may also increase the risk of digestive tract late effects:

- older age at diagnosis or when treatment begins
- treatment with both radiation therapy and chemotherapy
- a history of chronic graft-versus-host disease

#### Late effects that affect the digestive tract may cause certain health problems.

Digestive tract late effects and related health problems include:

- a narrowing of the esophagus or intestine
- the muscles of the esophagus do not work well
- reflux
- diarrhea, constipation, fecal incontinence, or blocked bowel
- bowel perforation (a hole in the intestine)
- inflammation of the intestines
- death of part of the intestine
- intestine is not able to absorb nutrients from food
- a second cancer

#### Possible symptoms of digestive tract late effects include abdominal pain and diarrhea.

These and other symptoms may be caused by digestive tract late effects or by other problems:

- trouble swallowing or feeling like food is stuck in the throat
- heartburn
- fever with severe pain in the abdomen and nausea
- pain in the abdomen
- a change in bowel habits (constipation or diarrhea)
- nausea and vomiting
- frequent gas pains, bloating, fullness, or cramps
- reflux

The only way to know if these symptoms are caused by digestive late effects is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the digestive tract.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Digital rectal exam is an exam where the doctor or nurse inserts a lubricated, gloved finger into the rectum to feel for lumps or anything else that seems unusual.
- Blood chemistry studies is a test that uses a blood sample to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.
- Kidney, ureter, and bladder x-ray is a type of radiation that can go through the body and make pictures of the abdomen, kidney, ureter, or bladder to check for signs of disease.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
- Magnetic resonance imaging (MRI) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- Barium swallow is a series of x-rays of the throat, esophagus, stomach, and the first part of the small intestine (duodenum). For this procedure, the patient drinks a liquid that contains barium (a silver-white metallic compound). The barium coats the esophagus and stomach which helps them show up more clearly in x-rays. This procedure is also called an upper GI series.

Talk to the doctor about whether tests and procedures are needed to check for signs of digestive tract late effects. If tests are needed, find out how often they should be done.

### Liver and bile ducts

#### Liver and bile duct late effects are more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause liver or bile duct late effects:

- acute lymphoblastic leukemia (ALL)
- liver cancer
- Wilms tumor
- cancers treated with a stem cell transplant

#### Certain types of chemotherapy and radiation to the liver or bile ducts increase the risk of late effects.

The risk of liver or bile duct late effects may be increased in childhood cancer survivors treated with:

- surgery to remove part of the liver or a liver transplant
- chemotherapy that includes high-dose cyclophosphamide as part of a stem cell transplant
- chemotherapy such as 6-mercaptopurine, 6-thioguanine, methotrexate, and dactinomycin
- radiation therapy to the liver and bile ducts, with the risk depending on:
  - the dose of radiation and how much of the liver is treated
  - age when treated (the younger the age, the higher the risk)
  - whether there was surgery to remove part of the liver
  - whether chemotherapy, such as doxorubicin or dactinomycin, was given together with radiation therapy
- stem cell transplant

The following may also increase the risk of liver and bile duct late effects:

- hepatitis B or hepatitis C infection
- history of chronic graft-versus-host disease
- liver damage caused by veno-occlusive disease/sinusoidal obstruction syndrome
- tissue and organ damage from the buildup of extra iron after having many blood transfusions

#### Late effects that affect the liver and bile ducts may cause certain health problems.

Liver and bile duct late effects and related health problems include:

- liver dysfunction
- gallstones
- benign liver lesions
- an overgrowth of connective tissue in the liver (liver fibrosis) or cirrhosis
- fatty liver with insulin resistance (a condition in which the body makes insulin but cannot use it well)

#### Possible symptoms of liver and bile duct late effects include abdominal pain and jaundice.

These and other symptoms may be caused by liver and bile duct late effects or by other problems:

- weight gain or weight loss
- swelling of the abdomen
- nausea and vomiting
- pain in the abdomen that may occur near the ribs, often on the right side after eating a fatty meal
- yellowing of the skin and whites of the eyes (jaundice)
- light-colored bowel movements
- diarrhea
- dark-colored urine
- a lot of gas
- lack of appetite
- feeling tired or weak

The only way to know if these symptoms are caused by liver and bile duct late effects is to see a doctor.

Sometimes there are no signs or symptoms of liver or bile duct late effects and treatment may not be needed.

#### Certain tests and procedures are used to diagnose health problems in the liver and bile duct.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Blood chemistry studies use a blood sample to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease. For example, there may be a higher level of bilirubin, alanine aminotransferase (ALT), and aspartate aminotransferase (AST) in the body if the liver has been damaged.
- Ferritin level uses a blood sample to measure the amount of ferritin. Ferritin is a protein that binds to iron and stores it for use by the body. After a stem cell transplant, a high ferritin level may be a sign of liver disease.
- Complete blood count (CBC) is when a sample of blood is drawn and checked for:
  - the number of red blood cells, white blood cells, and platelets
  - the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
  - the portion of the blood sample made up of red blood cells
  This test is used to check the amount of platelets in the body.
- Prothrombin time (PT) test measures how long it takes for the blood to clot.
- Hepatitis assay uses a blood sample to check for pieces of the hepatitis virus. The blood sample may also be used to measure how much hepatitis virus is in the blood. All patients who had a blood transfusion before 1972 should have a screening test for hepatitis B. Patients who had a blood transfusion before 1993 should have a screening test for hepatitis C.
- Ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs, such as the gall bladder, and make echoes. The echoes form a picture of body tissues called a sonogram.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs and tissue show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
- Magnetic resonance imaging (MRI) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Talk to the doctor about whether tests and procedures are needed to check for signs of liver or bile duct late effects. If tests are needed, find out how often they should be done.

#### Health habits that promote a healthy liver are important for survivors of childhood cancer.

Childhood cancer survivors with liver late effects should take care to protect their health, including:

- having a healthy weight
- not drinking alcohol
- getting vaccines for hepatitis A and hepatitis B viruses

### Pancreas

#### Radiation therapy increases the risk of pancreatic late effects.

The risk of pancreatic late effects may be increased in childhood cancer survivors after treatment with:

- radiation therapy to the abdomen
- total-body irradiation as part of a stem cell transplant

#### Late effects that affect the pancreas may cause certain health problems.

Pancreatic late effects and related health problems include:

- Insulin resistance is a condition in which the body does not use insulin the way it should. Insulin is needed to help control the amount of glucose (a type of sugar) in the body. Because the insulin does not work the way it should, glucose and fat levels rise.
- Diabetes mellitus is a disease in which the body does not make enough insulin or does not use it the way it should. When there is not enough insulin, the amount of glucose in the blood increases and the kidneys make a large amount of urine. Survivors also have an increased risk of prediabetes, which can lead to diabetes.

#### Possible symptoms of pancreatic late effects include frequent urination and being thirsty.

These and other symptoms may be caused by pancreatic late effects or by other problems:

- frequent urination
- feeling very thirsty
- feeling very hungry
- weight loss for no known reason
- feeling very tired
- frequent infections, especially of the skin, gums, or bladder
- blurred vision
- cuts or bruises that are slow to heal
- numbness or tingling in the hands or feet

The only way to know if these symptoms are caused by pancreatic late effects is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the pancreas.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Glycated hemoglobin (A1C) test uses a sample of blood to measure the amount of glucose that is attached to red blood cells. A higher-than-normal amount of glucose attached to red blood cells can be a sign of diabetes mellitus.
- Fasting blood sugar test uses a blood sample to measure the amount of glucose in the blood. This test is done after the patient has had nothing to eat overnight. A higher-than-normal amount of glucose in the blood can be a sign of diabetes mellitus.

## Endocrine System

Key Points for This Section
- Thyroid gland
  - Thyroid late effects are more likely to occur after treatment for certain childhood cancers.
  - Radiation therapy to the head and neck increases the risk of thyroid late effects.
  - Late effects that affect the thyroid may cause certain health problems.
  - Symptoms of thyroid late effects depend on whether there is too little or too much thyroid hormone in the body.
  - Certain tests and procedures are used to diagnose health problems in the thyroid.
- Hypothalamus and pituitary gland
  - Neuroendocrine late effects may be caused after treatment for certain childhood cancers.
  - Treatment that affects the hypothalamus or pituitary gland increases the risk of neuroendocrine system late effects.
  - Late effects that affect the hypothalamus may cause certain health problems.
  - Certain tests and procedures are used to diagnose health problems in the neuroendocrine system.
- Metabolic syndrome
  - Metabolic syndrome is more likely to occur after treatment for certain childhood cancers.
  - Radiation therapy increases the risk of metabolic syndrome.
  - Certain tests and procedures are used to diagnose metabolic syndrome.
  - Metabolic syndrome may cause heart and blood vessel disease and diabetes.
- Weight changes and frailty
  - Weight changes and frailty are late effects that are more likely to occur after treatment for certain childhood cancers.
  - Radiation therapy increases the risk of weight changes and frailty.
  - Certain tests and procedures are used to diagnose a change in weight.

### Thyroid gland

#### Thyroid late effects are more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause thyroid late effects:

- acute lymphoblastic leukemia (ALL)
- brain tumors
- head and neck cancers
- Hodgkin lymphoma
- neuroblastoma
- cancers treated with a stem cell transplant

#### Radiation therapy to the head and neck increases the risk of thyroid late effects.

The risk of thyroid late effects may be increased in childhood cancer survivors after treatment with:

- radiation therapy to the thyroid as part of radiation therapy to the head and neck or to the pituitary gland in the brain
- total-body irradiation or chemotherapy as part of a stem cell transplant
- MIBG (radioactive iodine) therapy for neuroblastoma
- chemotherapy such as alkylating agents, anthracyclines, or bleomycin
- surgery to remove part of the thyroid

The risk also is increased in females, in survivors who were a young age at the time of treatment, in survivors who had a higher radiation dose, and as the time since diagnosis and treatment gets longer. Risk for endocrine problems also depends on the location of the tumor.

#### Late effects that affect the thyroid may cause certain health problems.

Thyroid late effects and related health problems include:

- Hypothyroidism (not enough thyroid hormone): There is a higher risk of hypothyroidism in survivors treated with head and neck radiation involving the thyroid gland, especially survivors of Hodgkin lymphoma. This is the most common thyroid late effect. It usually occurs 2 to 5 years after treatment ends but may occur more than 25 years after radiation therapy. It is more common in girls than boys. Children, adolescents, and young adults treated with proton beam radiation therapy may have a lower risk of developing hypothyroidism.
- Hyperthyroidism (too much thyroid hormone): The risk of hyperthyroidism increases with higher doses of radiation therapy to the thyroid gland. Hyperthyroidism is less common than hypothyroidism. It usually occurs 5 years after treatment ends, but may occur more than 25 years after radiation therapy.
- Lumps in the thyroid: Higher radiation dose and longer time since diagnosis are linked to an increased risk of developing thyroid lumps. These growths may be benign (not cancerous) or malignant (cancer). It is more common in girls than boys. An enlarged thyroid (goiter) may be caused by lumps in the thyroid.

#### Symptoms of thyroid late effects depend on whether there is too little or too much thyroid hormone in the body.

These and other symptoms may be caused by thyroid late effects or by other problems:

Hypothyroidism (too little thyroid hormone)
- feeling tired or weak
- being more sensitive to cold
- pale, dry skin
- coarse and thinning hair
- brittle fingernails
- hoarse voice
- puffy face
- muscle and joint aches and stiffness
- constipation
- menstrual periods that are irregular or heavier than normal
- weight gain for no known reason
- depression or trouble with memory or being able to concentrate

Rarely, hypothyroidism does not cause any symptoms.

Hyperthyroidism (too much thyroid hormone)
- feeling nervous, anxious, or moody
- trouble sleeping
- feeling tired or weak
- having shaky hands
- having a fast heartbeat
- having red, warm skin that may be itchy
- having fine, soft hair that is falling out
- having frequent or loose bowel movements
- weight loss for no known reason
- being more sensitive to heat

The only way to know if these symptoms are caused by thyroid late effects is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the thyroid.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Blood hormone studies use a blood sample to measure the amounts of certain hormones released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease in the organ or tissue that makes it. The blood may be checked for abnormal levels of thyroid-stimulating hormone (TSH) or free thyroxine (T4).
- Ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. This procedure can show the size of the thyroid and whether there are nodules (lumps) on the thyroid.

Talk to the doctor about whether tests and procedures are needed to check for signs of thyroid late effects. If tests are needed, find out how often they should be done.

### Hypothalamus and pituitary gland

#### Neuroendocrine late effects may be caused after treatment for certain childhood cancers.

The neuroendocrine system is the nervous system and the endocrine system working together.

Treatment for these and other childhood cancers may cause neuroendocrine late effects:

- acute lymphoblastic leukemia (ALL)
- brain and spinal cord tumors
- head and neck cancers
- cancers treated with a stem cell transplant

#### Treatment that affects the hypothalamus or pituitary gland increases the risk of neuroendocrine system late effects.

Childhood cancer survivors have an increased risk for neuroendocrine late effects. These effects are caused by radiation therapy to treat cancer in the brain near the hypothalamus or used as total-body irradiation before a stem cell transplant. The hypothalamus controls the way hormones are made and released into the bloodstream by the pituitary gland. These effects are also caused by surgery in the area of the hypothalamus, pituitary gland, or optic pathways.

#### Late effects that affect the hypothalamus may cause certain health problems.

Childhood cancer survivors who have neuroendocrine late effects may have abnormal levels of hormones made in the pituitary gland and released into the blood. Neuroendocrine late effects and related health problems include:

- Growth hormone deficiency: Growth hormone helps promote growth and control metabolism. A low level of growth hormone is a common late effect of radiation to the brain in childhood cancer survivors. The higher the radiation dose and the longer the time since treatment, the greater the risk of this late effect. A low level of growth hormone may also occur in childhood ALL and stem cell transplant survivors who received radiation therapy to the brain and spinal cord and/or chemotherapy.
  A low level of growth hormone in childhood results in adult height that is shorter than normal. If the child's bones have not fully developed, low growth hormone levels may be treated with growth hormone replacement therapy beginning one year after the end of treatment.
- Adrenocorticotropin deficiency (ACTH): Adrenocorticotropic hormone controls the making of glucocorticoids. A low level of adrenocorticotropic hormone is an uncommon late effect. It may occur in survivors:
  - of childhood brain tumors, other tumors, or blood cancers
  - with low growth hormone levels or central hypothyroidism
  - who received radiation therapy to the brain
  - who received steroid hormone therapy
  Symptoms of adrenocorticotropin deficiency may not be severe and may not be noticed. Symptoms include:
  - weight loss for no known reason
  - not feeling hungry
  - nausea
  - vomiting
  - abdominal pain
  - low blood pressure
  - feeling tired
  - dizziness
  - muscle or joint pains
  - darkening of the skin
  - pale skin
  - low blood sugar
  - craving salts
  Low levels of adrenocorticotropin may be treated with hydrocortisone therapy.
- Hyperprolactinemia: Prolactin controls the making of breast milk and has many other effects in the body. A high level of the hormone prolactin may occur after a high dose of radiation to the brain or surgery that affects part of the pituitary gland. A high level of prolactin may cause:
  - puberty at a later age than normal
  - flow of breast milk in a woman who is not pregnant or breastfeeding
  - less frequent or no menstrual periods or menstrual periods with a very light flow
  - hot flashes
  - inability to become pregnant
  - inability to have an erection needed for sexual intercourse
  - lower sex drive (in men and women)
  - low bone mineral density (osteopenia)
  Sometimes there are no signs and symptoms. Treatment is rarely needed.
- Thyroid-stimulating hormone (TSH) deficiency: Thyroid-stimulating hormone controls the making of thyroid hormones. A low level of thyroid hormone may occur very slowly over time after radiation therapy to the brain. Thyroid-stimulating hormone deficiency may also be called central hyphothyroidism.
  Sometimes the symptoms of thyroid-stimulating hormone deficiency are not noticed. Low thyroid hormone levels may cause slow growth and delayed puberty, as well as other symptoms. Learn more about the symptoms of hypothyroidism.
  A low level of thyroid hormone may be treated with thyroid hormone replacement therapy.
- Luteinizing hormone or follicle-stimulating hormone imbalance: Luteinizing hormone and follicle-stimulating hormone control reproduction. Abnormal levels of these hormones can cause different health problems. The type of problem depends on the radiation dose and whether hormone levels are higher or lower than normal.
  Childhood cancer survivors who had brain tumors near the hypothalamus or pituitary gland, who were treated with lower doses of radiation to the brain, or who have hydrocephalus may develop central precocious puberty (a condition that causes puberty to start before age 8 in girls and 9 in boys). Central precocious puberty happens when the brain releases luteinizing and follicle-stimulating hormones too soon in the child's development. This condition may be treated with gonadotropin-releasing hormone (GnRH) agonist therapy to delay puberty and help the child's growth.
  Childhood cancer survivors who were treated with higher doses of radiation to the brain may have low levels of luteinizing hormone or follicle-stimulating hormone. This condition may be treated with sex hormone replacement therapy. The dose will depend on the child's age and whether the child has reached puberty.
- Central diabetes insipidus: Central diabetes insipidus may be caused by the absence of or low amounts of all of the hormones made in the front part of the pituitary gland and released into the blood. It may occur in childhood cancer survivors treated with surgery in the area of the hypothalamus or pituitary gland. Symptoms of central diabetes insipidus may include:
  - making large amounts of urine
  - feeling very thirsty
  - fatigue
  Symptoms of central diabetes insipidus in infants may include:
  - vomiting
  - diarrhea
  - irritability
  - slowed growth and development
  - weight loss for no known reason

#### Certain tests and procedures are used to diagnose health problems in the neuroendocrine system.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Blood chemistry study uses a blood sample to measure the amounts of certain substances, such as glucose, released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.
- Blood hormone studies use a blood sample to measure the amounts of certain hormones released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease in the organ or tissue that makes it. The blood may be checked for abnormal levels of follicle-stimulating hormone, luteinizing hormone, estradiol, testosterone, cortisol, or free thyroxine (T4).
- Lipid profile studies use a blood sample to measure the amounts of triglycerides, cholesterol, and low- and high-density lipoprotein cholesterol in the blood.

Talk to the doctor about whether tests and procedures are needed to check for signs of neuroendocrine late effects. If tests are needed, find out how often they should be done.

### Metabolic syndrome

#### Metabolic syndrome is more likely to occur after treatment for certain childhood cancers.

Metabolic syndrome is a group of medical conditions that includes having too much fat around the abdomen and at least two of the following:

- high blood pressure
- high levels of triglycerides and low levels of high-density lipoprotein (HDL) cholesterol in the blood
- high levels of glucose (sugar) in the blood

Treatment for these and other childhood cancers may cause metabolic syndrome to occur later in life:

- acute lymphoblastic leukemia (ALL)
- cancers treated with a stem cell transplant
- cancers treated with radiation to the abdomen, such as Wilms tumor or neuroblastoma

#### Radiation therapy increases the risk of metabolic syndrome.

The risk of metabolic syndrome may be increased in childhood cancer survivors after treatment with:

- radiation therapy to the brain, abdomen, or pelvis
- total-body irradiation (TBI) as part of a stem cell transplant
- chemotherapy, such as alkylating agents
- older age

#### Certain tests and procedures are used to diagnose metabolic syndrome.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Blood chemistry studies use a blood sample to measure the amounts of certain substances, such as glucose, released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.
- Lipid profile studies use a blood sample to measure the amounts of triglycerides, cholesterol, and low- and high-density lipoprotein cholesterol in the blood.

Talk to the doctor about whether tests and procedures are needed to check for signs of metabolic syndrome. If tests are needed, find out how often they should be done.

#### Metabolic syndrome may cause heart and blood vessel disease and diabetes.

Metabolic syndrome is linked to an increased risk of heart and blood vessel disease and diabetes. Health habits that decrease these risks include:

- having a healthy weight
- eating a heart-healthy diet
- exercising regularly
- not smoking

### Weight changes and frailty

#### Weight changes and frailty are late effects that are more likely to occur after treatment for certain childhood cancers.

Weight changes include being underweight or having excess body weight or obesity. Frailty is a condition that usually affects older adults and includes having fatigue, slow walking speed, and muscle weakness.

Treatment for these and other childhood cancers may cause a change in weight or frailty:

- acute lymphoblastic leukemia (ALL)
- brain tumors, especially craniopharyngiomas
- bone tumors
- cancers treated with radiation to the brain, including TBI as part of a stem cell transplant

Graft-versus-host disease may also cause a change in weight for patients treated with a stem cell transplant.

#### Radiation therapy increases the risk of weight changes and frailty.

The risk of being underweight increases after treatment with:

- TBI for females
- radiation therapy to the abdomen for males
- certain types of chemotherapy (alkylating agents and anthracyclines)

The following may also increase the risk of being underweight:

- being female
- having a low household income
- having a chronic illness

The risk of having excess body weight or obesity increases after treatment with:

- radiation therapy to the brain
- surgery that damages the hypothalamus or pituitary gland, such as surgery to remove a craniopharyngioma brain tumor

The following may also increase the risk of obesity:

- having excess body weight at the time of a cancer diagnosis
- being diagnosed with cancer between the ages of 5 and 9
- being female
- having growth hormone deficiency or low levels of the hormone leptin
- lack of physical activity
- taking an antidepressant called paroxetine

Childhood cancer survivors who get enough exercise and have a normal amount of anxiety have a lower risk of obesity.

The risk of frailty increases after treatment with:

- radiation therapy to the brain
- TBI

#### Certain tests and procedures are used to diagnose a change in weight.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Blood chemistry studies use a blood sample to measure the amounts of certain substances, such as glucose, released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.
- Lipid profile studies use a blood sample to measure the amounts of triglycerides, cholesterol, and low- and high-density lipoprotein cholesterol in the blood.

Being underweight, having excess body weight, or having obesity may be measured by weight, body mass index, percent of body fat, or size of the abdomen (belly fat).

Talk to the doctor about whether tests and procedures are needed to check for signs of a change in weight. If tests are needed, find out how often they should be done.

## Immune System

Key Points for This Section
- Cancer treatments and surgery to remove the spleen increase the risk of immune system late effects.
- Late effects that affect the immune system may cause infection.
- Children who have had their spleen removed or have lost vaccine immunity may need antibiotics or booster vaccine doses to lessen the risk of infection.

### Cancer treatments and surgery to remove the spleen increase the risk of immune system late effects.

The risk of health problems that affect the immune system increases after treatment that affects the spleen, including:

- surgery to remove the spleen
- high-dose radiation therapy to the spleen that causes the spleen to stop working
- stem cell transplant followed by graft-versus-host disease that causes the spleen to stop working

The risk of health problems that affect the immune system may increase after treatment with:

- chemotherapy
- radiation therapy
- stem cell transplant with or without graft-versus-host disease

### Late effects that affect the immune system may cause infection.

Late effects that affect the immune system may increase the risk of viral infections or very serious bacterial infections. This risk is higher in younger children than in older children and in children who have decreased vaccine coverage after cancer treatment. The risk may be greater in the early years after the spleen stops working or is removed by surgery. These symptoms may be caused by infection:

- redness, swelling, or warmth of a part of the body
- pain that is in one part of the body, such as the eye, ear, or throat
- fever

An infection may cause other symptoms that depend on the part of the body affected. For example, a lung infection may cause a cough and trouble breathing.

### Children who have had their spleen removed or have lost vaccine immunity may need antibiotics or booster vaccine doses to lessen the risk of infection.

Daily antibiotics may be prescribed for children younger than 5 years whose spleen is no longer working or for at least 1 year after surgery to remove the spleen. For certain high-risk patients, daily antibiotics may be prescribed throughout childhood and into adulthood.

In addition, children with an increased risk of infection should be vaccinated on a schedule through adolescence against:

- pneumococcal disease
- meningococcal disease
- Haemophilus influenzae type b (Hib) disease
- diphtheria-tetanus-pertussis (DTaP)
- hepatitis B
- measles
- mumps

Some children may lose the protection they had from vaccines during their cancer treatments. Talk to the doctor about whether childhood vaccinations given before cancer treatment need to be repeated.

## Musculoskeletal System

Key Points for This Section
- Bone and joint late effects are more likely to occur after treatment for certain childhood cancers.
- Radiation therapy, surgery, chemotherapy, and other treatments increase the risk of bone and joint late effects.
  - Radiation therapy
  - Surgery
  - Chemotherapy and other drug therapy
  - Stem cell transplant
- Possible symptoms of bone and joint late effects include swelling over a bone or bone and joint pain.
- Certain tests and procedures are used to diagnose health problems in the bone and joint.

### Bone and joint late effects are more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause bone and joint late effects:

- acute lymphoblastic leukemia (ALL)
- bone cancer
- brain and spinal cord tumors
- Ewing sarcoma
- head and neck cancers
- neuroblastoma
- non-Hodgkin lymphoma
- osteosarcoma
- retinoblastoma
- soft tissue sarcoma, such as rhabdomyosarcoma
- Wilms tumor
- cancers treated with a stem cell transplant

Poor nutrition and not enough exercise may also cause bone late effects.

### Radiation therapy, surgery, chemotherapy, and other treatments increase the risk of bone and joint late effects.

#### Radiation therapy

Radiation therapy can stop or slow the growth of bone and muscle. The type of bone and joint late effects depends on the part of the body that received radiation therapy. Radiation therapy may cause:

- changes in the way the face or skull form, especially when high-dose radiation with or without chemotherapy is given to children before age 5 years
- short stature (being shorter than normal)
- curving of the spine (scoliosis) or rounding of the spine (kyphosis)
- one arm or leg is shorter than the other arm or leg
- weak or thin bones that can break easily (osteoporosis)
- parts of a bone to die from a lack of blood flow (osteoradionecrosis), especially the jaw
- a benign tumor of the bone (osteochondroma)

#### Surgery

Amputation or limb-sparing surgery to remove the cancer and prevent it from coming back may cause late effects depending on where the tumor was, age of the patient, and type of surgery. Health problems after amputation or limb-sparing surgery may include:

- having problems with activities of daily living
- not being able to be as active as normal
- chronic pain
- problems with the way prosthetics fit or work
- broken bone
- additional surgeries later in life
- the bone not healing well after surgery
- one arm or leg is shorter than the other

Studies show no difference in quality of life for childhood cancer survivors who had amputation compared to those who had limb-sparing surgery.

#### Chemotherapy and other drug therapy

Risk may be increased in childhood cancer survivors who received cancer treatment that included methotrexate or corticosteroids or glucocorticoids such as dexamethasone. Drug therapy may cause:

- weak or thin bones that can break easily (osteoporosis)
- one or more parts of a bone to die from a lack of blood flow (osteonecrosis), especially in the hip or knee

#### Stem cell transplant

A stem cell transplant can affect the bone and joints in different ways:

- Total-body irradiation given as part of a stem cell transplant may affect the body's ability to make growth hormone and cause short stature (being shorter than normal). It may also cause weak or thin bones that can break easily (osteoporosis) and the formation of a benign tumor called osteochondroma.
- Chronic graft-versus-host disease that may occur after a stem cell transplant can cause the muscles around joints to tighten, leading to stiff joints (joint contractures). Chronic graft-versus-host disease may also cause one or more parts of a bone to die from a lack of blood flow (osteonecrosis).

### Possible symptoms of bone and joint late effects include swelling over a bone or bone and joint pain.

These and other symptoms may be caused by bone and joint late effects or by other problems:

- swelling over a bone or bony part of the body
- pain in a bone or joint
- redness or warmth over a bone or joint
- joint stiffness or trouble moving normally
- a bone that breaks easily or for no known reason
- short stature (being shorter than normal)
- one side of the body looks higher than the other side or the body tilts to one side
- always sitting or standing in a slouching position or having the appearance of a hunched back

The only way to know if these symptoms are caused by bone and joint late effects is to see a doctor.

### Certain tests and procedures are used to diagnose health problems in the bone and joint.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Bone mineral density scan is an imaging test that measures bone density (the amount of bone mineral in a certain amount of bone) by passing x-rays with two different energy levels through the bone. It is used to diagnose osteoporosis (weak or thin bones that can break easily). Also called BMD scan, DEXA, DEXA scan, dual energy x-ray absorptiometric scan, dual x-ray absorptiometry, and DXA.
- X-ray is a type of radiation that can go through the body and make pictures of areas inside the body, such as bones.
- Vitamin D test uses a sample of blood to measure the amount of vitamin D in the body. Vitamin D is a nutrient the body needs to build and maintain strong bones.
- Calcium blood test uses a sample of blood to measure the amount of calcium in the body. Calcium is a mineral the body needs to build and maintain strong bones.

Talk to the doctor about whether tests and procedures are needed to check for signs of bone and joint late effects. If tests are needed, find out how often they should be done.

## Reproductive System

Key Points for This Section
- Reproductive system late effects are more likely to occur after treatment for certain childhood cancers.
- Surgery, radiation therapy, and certain types of chemotherapy increase the risk of late effects that affect the reproductive system.
- Testicles
  - Late effects that affect the testicles may cause certain health problems.
  - Certain tests and procedures are used to diagnose health problems in the testicles.
- Ovaries
  - Late effects that affect the ovaries may cause certain health problems.
  - Possible symptoms of ovarian late effects include irregular or absent menstrual periods and hot flashes.
  - Certain tests and procedures are used to diagnose health problems in the ovaries.
- Fertility and reproduction
  - Childhood cancer survivors may have late effects that affect pregnancy.
  - There are methods that may be used to help childhood cancer survivors have children.
  - Children of childhood cancer survivors are not affected by the parent's previous treatment for cancer.

### Reproductive system late effects are more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause testicular late effects:

- acute lymphoblastic leukemia (ALL)
- Ewing sarcoma
- germ cell tumors
- Hodgkin lymphoma
- non-Hodgkin lymphoma
- rhabdomyosarcoma
- soft tissue sarcoma
- testicular cancer
- cancers treated with a stem cell transplant

Treatment for these and other childhood cancers may cause ovarian late effects:

- acute lymphoblastic leukemia (ALL)
- germ cell tumors
- Hodgkin lymphoma
- Wilms tumor
- neuroblastoma
- cancers treated with a stem cell transplant

### Surgery, radiation therapy, and certain types of chemotherapy increase the risk of late effects that affect the reproductive system.

The risk of health problems that affect the reproductive system increases after treatment with:

- surgery, such as the removal of a testicle, part of the prostate, lymph nodes in the abdomen, or one or both ovaries
- chemotherapy with alkylating agents, such as cyclophosphamide, dacarbazine, procarbazine, ifosfamide, mechlorethamine, cisplatin, lomustine, and busulfan
- radiation therapy to the abdomen, pelvis, lower back, testicles, ovaries, uterus, or in the area of the hypothalamus in the brain
- total-body irradiation, high-dose chemotherapy, or both before a stem cell transplant
- radiation therapy to the abdomen or pelvis with alkylating agents

In female survivors who had radiation therapy to the abdomen, the damage to the ovaries depends on the radiation dose, age at the time of treatment, and whether all or part of the abdomen received radiation.

### Testicles

#### Late effects that affect the testicles may cause certain health problems.

Late effects of the testicles and related health problems include:

- Low sperm count: A zero sperm count or a low sperm count may be temporary or permanent. This depends on the radiation dose and schedule, the area of the body treated, and the age when treated.
- Low testosterone levels: This can lead to underdeveloped testicles, infertility, and sexual problems in adulthood.
- Infertility: The inability to father a child.
- Retrograde ejaculation: Very little or no semen comes out of the penis during orgasm.

After treatment with chemotherapy or radiation, the body's ability to make sperm may come back over time.

#### Certain tests and procedures are used to diagnose health problems in the testicles.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests:

- Blood hormone studies use a blood sample to measure the amounts of certain hormones released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease in the organ or tissue that makes it. The blood may be checked for abnormal levels of follicle-stimulating hormone, luteinizing hormone, testosterone.
- Semen analysis (sperm count) measures the amount and quality of semen and sperm to see if there are problems that are causing infertility.

### Ovaries

#### Late effects that affect the ovaries may cause certain health problems.

Ovarian late effects and other health-related problems include:

- early menopause, especially in women who had their ovaries removed or were treated with both an alkylating agent and radiation therapy to the abdomen
- changes in menstrual periods
- infertility (inability to conceive a child)
- puberty does not begin

Hormone replacement therapy can be used to start puberty.

#### Possible symptoms of ovarian late effects include irregular or absent menstrual periods and hot flashes.

These and other symptoms may be caused by ovarian late effects or by other problems:

- irregular or no menstrual periods
- hot flashes
- drenching night sweats
- trouble sleeping
- mood changes
- lowered sex drive
- vaginal dryness
- sex traits, such as developing arm, pubic, and leg hair or having the breasts enlarge, do not occur at puberty
- weak or thin bones that can break easily (osteoporosis)
- inability to get pregnant

The only way to know if these symptoms are caused by late effects to the ovaries is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the ovaries.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following test.

- Blood hormone studies use a blood sample to measure the amounts of certain hormones released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease in the organ or tissue that makes it. The blood may be checked for abnormal levels of follicle-stimulating hormone, luteinizing hormone, estradiol, or TSH.

### Fertility and reproduction

#### Childhood cancer survivors may have late effects that affect pregnancy.

Late effects on pregnancy include increased risk of:

- high blood pressure
- diabetes during pregnancy
- anemia
- miscarriage or stillbirth
- low birth-weight babies
- early labor and/or delivery
- impaired blood flow to the uterus
- delivery by Cesarean section
- the fetus is not in the right position for birth (for example, the foot or buttock is in position to come out before the head)
- peripartum cardiomyopathy

Long-term survivors of childhood, adolescent, and young adult cancers who have received radiation therapy or certain types of chemotherapy are at risk of a rare type of heart failure during pregnancy called peripartum cardiomyopathy. It may occur during late pregnancy and up to 5 months after giving birth. If cancer treatments have caused damage to the heart, these patients may also be at risk of congestive heart failure during pregnancy. Patients at risk of these conditions should be closely followed for weakness of the heart muscle during pregnancy.

Some studies have not shown an increased risk of late effects on pregnancy.

#### There are methods that may be used to help childhood cancer survivors have children.

The following methods may be used so that childhood cancer survivors can have children:

- freezing the eggs or sperm before cancer treatment in patients who have reached puberty (egg and sperm banking)
- preventing damage to the ovaries before radiation therapy by moving one or both ovaries and fallopian tubes out of the field of radiation and attaching them to the wall of the abdomen (ovarian transposition)
- removing a small amount of tissue containing sperm from the testicle (testicular sperm extraction)
- fertilizing an egg outside the body by injecting a sperm into it (intracytoplasmic sperm injection)
- in vitro fertilization (IVF), which is a procedure where eggs and sperm are placed together in a container, giving the sperm the chance to enter an egg

#### Children of childhood cancer survivors are not affected by the parent's previous treatment for cancer.

The children of childhood cancer survivors do not appear to have an increased risk of birth defects, genetic disease, or cancer.

## Respiratory System

Key Points for This Section
- Lung late effects are more likely to occur after treatment for certain childhood cancers.
- Certain types of chemotherapy and radiation to the lungs increase the risk of lung late effects.
- Late effects that affect the lungs may cause certain health problems.
- Possible symptoms of lung late effects include trouble breathing and cough.
- Certain tests and procedures are used to diagnose health problems in the lung.
- Health habits that promote healthy lungs are important for survivors of childhood cancer.

### Lung late effects are more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause lung late effects:

- germ cell tumors
- head and neck cancers
- Hodgkin lymphoma
- leukemia
- neuroblastoma
- Wilms tumor
- cancers treated with a stem cell transplant

### Certain types of chemotherapy and radiation to the lungs increase the risk of lung late effects.

The risk of health problems that affect the lungs increases after treatment with:

- surgery to remove all or part of the lung or chest wall
- chemotherapy, such as bleomycin, busulfan, carmustine, or lomustine
- total-body irradiation or high-dose chemotherapy before a stem cell transplant
- radiation therapy to the chest

In survivors who had radiation to the chest, the damage to the lungs and chest wall depends on the radiation dose, whether all or part of the lungs and chest wall received radiation, whether the radiation was given in small, divided daily doses, and the child's age at treatment.

The risk of lung late effects is greater in childhood cancer survivors who are treated with a combination of surgery, chemotherapy, and/or radiation therapy. The risk is also increased in survivors who have a history of:

- infections or graft-versus-host disease after a stem cell transplant
- lung or airway disease, such as asthma, before cancer treatment
- an abnormal chest wall
- smoking cigarettes or other substances

### Late effects that affect the lungs may cause certain health problems.

Lung late effects and related health problems include:

- inflamed lung caused by radiation therapy (radiation pneumonitis)
- buildup of scar tissue in the lung (pulmonary fibrosis)
- other lung and airway problems, such as chronic obstructive pulmonary disease (COPD), pneumonia, pneumothorax, cough that does not go away, and asthma

### Possible symptoms of lung late effects include trouble breathing and cough.

These and other symptoms may be caused by lung late effects or by other problems:

- shortness of breath (dyspnea), especially when being active
- wheezing
- fever
- chronic cough
- congestion (a feeling of fullness in the lungs from extra mucus)
- chronic lung infections
- feeling tired

The only way to know if these symptoms are caused by lung late effects is to see a doctor.

Lung late effects in childhood cancer survivors may occur slowly over time or there may be no symptoms. Sometimes lung damage can be detected only by imaging or pulmonary function testing. Lung late effects may improve over time.

### Certain tests and procedures are used to diagnose health problems in the lung.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Chest x-ray is an x-ray of the organs and bones inside the chest. An x-ray is a type of radiation that can go through the body and make pictures of areas inside the body.
- Pulmonary function test (PFT) is a test to see how well the lungs are working. It measures how much air the lungs can hold and how quickly air moves into and out of the lungs. It also measures how much oxygen is used and how much carbon dioxide is given off during breathing. This is also called lung function test.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the chest. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

Talk to the doctor about whether tests and procedures are needed to check for signs of lung late effects. If tests are needed, find out how often they should be done.

### Health habits that promote healthy lungs are important for survivors of childhood cancer.

Childhood cancer survivors with lung late effects should take care to protect their health, including:

- Not smoking. Self-help programs and counseling are available to those who want to quit. Learn more about the health risks of cigarette smoking and how to quit.
- Getting vaccines for flu and pneumococcus.

## Senses

Key Points for This Section
- Hearing
  - Hearing problems are a late effect that is more likely to occur after treatment for certain childhood cancers.
  - Radiation therapy to the brain and certain types of chemotherapy increase the risk of hearing loss.
  - Hearing loss is the most common sign of hearing late effects.
  - Certain tests and procedures are used to diagnose health problems in the ear and hearing problems.
- Seeing
  - Eye and vision problems are a late effect that is more likely to occur after treatment for certain childhood cancers.
  - Radiation therapy to the brain or head increases the risk of eye problems or vision loss.
  - Late effects that affect the eye may cause certain health problems.
  - Possible signs and symptoms of eye and vision late effects include changes in vision and dry eyes.
  - Certain tests and procedures are used to diagnose health problems in the eye and vision problems.

### Hearing

#### Hearing problems are a late effect that is more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause hearing late effects:

- bone cancer
- brain tumors
- germ cell tumors
- head and neck cancers
- liver cancer
- neuroblastoma
- retinoblastoma
- soft tissue sarcoma
- cancers that are treated with a stem cell transplant

#### Radiation therapy to the brain and certain types of chemotherapy increase the risk of hearing loss.

The risk of hearing loss is increased in childhood cancer survivors after treatment with:

- certain types of chemotherapy, such as cisplatin or high-dose carboplatin
- radiation therapy to the brain

The risk of hearing loss from radiation therapy is greater in children who are diagnosed with cancer before age 5 years, and the risk increases for children of all ages with higher radiation doses. The risk of hearing loss is also greater in childhood cancer survivors who received radiation therapy to the brain and chemotherapy at the same time.

The risk of hearing loss may be lower if children treated with cisplatin were also given a drug called sodium thiosulfate.

#### Hearing loss is the most common sign of hearing late effects.

These and other symptoms may be caused by hearing late effects or by other problems:

- hearing loss
- ringing in the ears
- feeling dizzy
- too much hardened wax in the ear

The only way to know if these symptoms are caused by hearing late effects is to see a doctor.

Hearing loss may occur during treatment, soon after treatment ends, or several months or years after treatment ends and worsen over time. A young child may have trouble learning, communicating, doing well in school, and interacting with others if they have hearing loss. In adulthood, hearing loss can lead to social isolation, depression, anxiety, and trouble finding stable employment. Talk to a doctor to learn about hearing aids or other ways to cope with hearing loss.

#### Certain tests and procedures are used to diagnose health problems in the ear and hearing problems.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Otoscopic exam is an exam of the ear. An otoscope is used to look at the ear canal and the eardrum to check for signs of infection or hearing loss. Sometimes the otoscope has a plastic bulb that is squeezed to release a small puff of air into the ear canal. In a healthy ear, the eardrum will move. If there is fluid behind the eardrum, it will not move.
- Hearing test can be done in different ways depending on a person's age. The test is done to check if the person can hear soft and loud sounds and low- and high-pitched sounds. Each ear is checked separately.

Talk to the doctor about whether tests and procedures are needed to check for signs of hearing late effects. If tests are needed, find out how often they should be done.

### Seeing

#### Eye and vision problems are a late effect that is more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause eye and vision late effects:

- acute lymphoblastic leukemia (ALL)
- brain tumors
- head and neck cancers
- retinoblastoma, rhabdomyosarcoma, and other tumors of the eye
- cancers treated with total-body irradiation (TBI) before a stem cell transplant

#### Radiation therapy to the brain or head increases the risk of eye problems or vision loss.

The risk of eye problems or vision loss may be increased in childhood cancer survivors after treatment with:

- radiation therapy to the brain, eye, or eye socket
- surgery to remove the eye or a tumor near the optic nerve
- certain types of chemotherapy, such as cytarabine and doxorubicin
- TBI, busulfan, and corticosteroids as part of a stem cell transplant

Having a history of chronic graft-versus-host disease after a stem cell transplant can also increase the risk of eye problems and vision loss.

#### Late effects that affect the eye may cause certain health problems.

Eye late effects and related health problems include:

- having a small eye socket that affects the shape of the child's face as it grows
- loss of vision
- vision problems, such as cataracts or glaucoma
- not being able to make tears
- damage to the optic nerve and retina
- eyelid tumors

#### Possible signs and symptoms of eye and vision late effects include changes in vision and dry eyes.

These and other symptoms may be caused by eye and vision late effects or by other problems:

- changes in vision, such as:
  - not being able to see objects that are close
  - not being able to see objects that are far away
  - double vision
  - cloudy or blurred vision
  - colors seem faded
  - being sensitive to light or trouble seeing at night
  - seeing a glare or halo around lights at night
- dry eyes that may feel like they are itchy, burning, or swollen, or like there is something in the eye
- eye pain
- eye redness
- having a growth on the eyelid
- drooping of the upper eyelid

The only way to know if these symptoms are caused by eye and vision late effects is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the eye and vision problems.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Eye exam with dilated pupil is when the pupil is dilated (widened) with medicated eye drops to allow the doctor to look through the lens and pupil to the retina. The inside of the eye, including the retina and the optic nerve, is checked using an instrument that makes a narrow beam of light. This is sometimes called a slit-lamp exam. If there is a tumor, the doctor may take pictures over time to keep track of changes in the size of the tumor and how fast it is growing.
- Indirect ophthalmoscopy is an exam of the inside of the back of the eye using a small magnifying lens and a light.

Talk to the doctor about whether tests and procedures are needed to check for signs of eye and vision late effects. If tests are needed, find out how often they should be done.

## Urinary System

Key Points for This Section
- Kidney
  - Kidney problems are a late effect that is more likely to occur after treatment for certain childhood cancers.
  - Certain types of chemotherapy increase the risk of kidney late effects.
  - Late effects that affect the kidney may cause certain health problems.
  - Possible symptoms of kidney late effects include problems urinating and swelling of the feet or hands.
  - Certain tests and procedures are used to diagnose health problems in the kidney.
  - Health habits that promote healthy kidneys are important for survivors of childhood cancer.
- Bladder
  - Bladder problems are a late effect that is more likely to occur after treatment for certain childhood cancers.
  - Surgery to the pelvic area and certain types of chemotherapy increase the risk of bladder late effects.
  - Late effects that affect the bladder may cause certain health problems.
  - Possible symptoms of bladder late effects include changes in urination and swelling of the feet or hands.
  - Certain tests and procedures are used to diagnose health problems in the bladder.

### Kidney

#### Kidney problems are a late effect that is more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause kidney late effects:

- Wilms tumor
- cancers treated with a stem cell transplant

#### Certain types of chemotherapy increase the risk of kidney late effects.

The risk of health problems that affect the kidney increases after treatment with:

- chemotherapy including cisplatin, carboplatin, ifosfamide, and methotrexate
- radiation therapy to the abdomen or middle of the back
- surgery to remove part or all of a kidney
- stem cell transplant

The risk of kidney late effects is greater in childhood cancer survivors who were treated with a combination of surgery, chemotherapy, or radiation therapy.

The following may also increase the risk of kidney late effects:

- having cancer in both kidneys
- having a genetic syndrome that increases the risk of kidney problems, such as Denys-Drash syndrome or WAGR syndrome
- being treated with more than one type of treatment

#### Late effects that affect the kidney may cause certain health problems.

Kidney late effects or related health problems include:

- damage to the parts of the kidney that filter and clean the blood or the parts that remove extra water from the blood
- loss of electrolytes, such as magnesium, calcium, or potassium, from the body
- high blood pressure (hypertension)

#### Possible symptoms of kidney late effects include problems urinating and swelling of the feet or hands.

These and other symptoms may be caused by kidney late effects or by other problems:

- feeling the need to urinate without being able to do so
- frequent urination (especially at night)
- trouble urinating
- feeling very tired
- swelling of the legs, ankles, feet, face, or hands
- itchy skin
- shortness of breath
- nausea or vomiting
- loss of appetite
- a metal-like taste in the mouth or bad breath
- headache

Sometimes there are no signs or symptoms in the early stages. Signs or symptoms may appear as damage to the kidney continues over time. The only way to know if these symptoms are caused by kidney late effects is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the kidney.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Blood chemistry study uses a blood sample to measure the amounts of certain substances, such as creatinine, released into the blood by organs and tissues in the body. An unusual amount of a substance may be a sign of kidney disease.
- Urinalysis checks the color of urine and its contents, such as sugar, protein, red blood cells, and white blood cells.
- Ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs, such as the kidney, and make echoes. The echoes form a picture of body tissues called a sonogram.

Talk to the doctor about whether tests and procedures are needed to check for signs of kidney late effects. If tests are needed, find out how often they should be done.

If kidney problems are found, treatment options are available, including kidney transplant.

#### Health habits that promote healthy kidneys are important for survivors of childhood cancer.

Childhood cancer survivors who had all or part of their kidney removed should talk to their doctor about:

- whether it is safe to play sports that have a high risk of heavy contact or impact such as football or hockey
- bicycle safety and avoiding handlebar injuries
- wearing a seatbelt around the hips, not the waist

### Bladder

#### Bladder problems are a late effect that is more likely to occur after treatment for certain childhood cancers.

Treatment for these and other childhood cancers may cause bladder late effects:

- retinoblastoma
- cancers treated with a stem cell transplant

#### Surgery to the pelvic area and certain types of chemotherapy increase the risk of bladder late effects.

The risk of health problems that affect the bladder increases after treatment with:

- surgery to remove part or all of the bladder
- surgery to the pelvis, spine, or brain
- certain types of chemotherapy, such as cyclophosphamide or ifosfamide
- radiation therapy to areas near the bladder, pelvis, or urinary tract
- stem cell transplant

#### Late effects that affect the bladder may cause certain health problems.

Bladder late effects and related health problems include:

- inflammation of the inside of the bladder wall, which leads to bleeding (hemorrhagic cystitis)
- thickening of the bladder wall
- decreased urine storage
- trouble emptying the bladder
- incontinence
- a blockage in the kidney, ureter, bladder, or urethra
- urinary tract infections that last a long time or keep coming back

#### Possible symptoms of bladder late effects include changes in urination and swelling of the feet or hands.

These and other symptoms may be caused by bladder late effects or by other problems:

- feeling the need to urinate without being able to do so
- frequent urination (especially at night)
- trouble urinating
- feeling like the bladder does not empty completely after urination
- swelling of the legs, ankles, feet, face, or hands
- little or no bladder control
- blood in the urine

The only way to know if these symptoms are caused by bladder late effects is to see a doctor.

#### Certain tests and procedures are used to diagnose health problems in the bladder.

In addition to asking the childhood cancer survivor about their personal and family health history and doing a physical exam, the doctor may perform the following tests and procedures:

- Blood chemistry study uses a blood sample to measure the amounts of certain substances, such as magnesium, calcium, and potassium, released into the blood by organs and tissues in the body. An unusual amount of a substance may be a sign of bladder problems.
- Urinalysis checks the color of urine and its contents, such as sugar, protein, red blood cells, and white blood cells.
- Urine culture checks for bacteria, yeast, or other microorganisms in the urine when there are symptoms of infection. Urine cultures can help identify the type of microorganism that is causing an infection. Treatment of the infection depends on the type of microorganism that is causing the infection.
- Ultrasound exam uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs, such as the bladder, and make echoes. The echoes form a picture of body tissues called a sonogram.

Talk to the doctor about whether tests and procedures are needed to check for signs of bladder late effects. If tests are needed, find out how often they should be done.

## To Learn More About Late Effects of Treatment for Childhood Cancer

For more information about late effects of treatment for childhood cancer:

- Long-Term Follow-Up Guidelines for Survivors of Childhood, Adolescent, and Young Adult Cancers (http://www.survivorshipguidelines.org/)
- Late Effects Directory of Services (https://cogmembers.org/public/lateeffects/default.aspx)
- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)

For more childhood cancer information and other general cancer resources from the National Cancer Institute:

- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the late effects of treatment for childhood cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Late Effects of Treatment for Childhood Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/late-effects-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389365]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).